# Pruritus (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of pruritus. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Pruritus is usually an unpleasant sensation that elicits a desire to scratch, subjectively quantified by intensity, severity, location, and intractability. It may be proposed that itch is akin to pain because both sensations are thought to be transmitted from the skin to the central nervous system (CNS) through nociceptive small-caliber C nerve fibers.[1] The perception of pruritus, much like the perception of pain, is greatly altered by psychological and CNS factors, accounting for great subjective variability between individuals in perceived pruritus from the same pruritogen. Because of the subjective nature of pruritus, the lack of a precise definition, and only recent development of a suitable murine model, pruritus is a disorder that has not been researched adequately.[2]

This summary will focus on pruritus in the absence of a primary dermatosis, as is often encountered in patients receiving cancer treatment. However, there may still be significant secondary skin changes noted in the form of lichen simplex chronicus, prurigo nodules, linear excoriations, linear petechiae, or superficial erosions in places the patient can reach to scratch (either with fingernails, back scratchers, or makeshift tools).

Pruritus is a manifestation of an underlying systemic disease in approximately 10% to 25% of affected individuals.[3] In a single-institution retrospective review, patients seeking care for pruritus were more likely to have a concomitant diagnosis of cancer than patients without pruritus (odds ratio [OR], 5.76; 95% confidence interval, 5.53–6.00). The OR for malignancy was higher in White patients than in African American patients.[4] Nondermatological conditions that can lead to generalized pruritus include the following:[3]

- Hepatic, renal, or thyroid dysfunction.
- Malignancies, including lymphoma, chronic lymphocytic leukemia, and cancers of the liver, gallbladder, biliary tract, and skin.[4]
- Myeloproliferative neoplasms (e.g., polycythemia vera).
- HIV or parasitic infections.
- Neuropsychiatric disorders.

Despite the wide array of diseases that may present with pruritus, a systematic evaluation of the differential using a good history, review of systems, and appropriate blood work will lead to a rational and finite group of etiologies. Then correction of the underlying cause (if possible) and treatment of pruritus may ensue.

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### References

Schmelz M: A neural pathway for itch. Nat Neurosci 4 (1): 9-10, 2001.11135635
Feng J, Yang P, Mack MR, et al.: Sensory TRP channels contribute differentially to skin inflammation and persistent itch. Nat Commun 8 (1): 980, 2017.29081531
Weisshaar E, Fleischer AB Jr, Bernhard JD, et al.: Pruritus and dysesthesia. In: Bolognia JL, Jorizzo JL, Schaffer JV: Dermatology. 3rd ed. Elsevier Saunders, 2012, pp 111-25.
Larson VA, Tang O, Ständer S, et al.: Association between itch and cancer in 16,925 patients with pruritus: Experience at a tertiary care center. J Am Acad Dermatol 80 (4): 931-937, 2019.30217520

## Etiology and Pathophysiology

When a primary dermatitis is present, the differential may be narrowed by the history and physical findings, such as:

- Stigmata of atopic dermatitis.
- Psoriasis.
- Scabies.
- Allergic contact dermatitis.
- Primary cutaneous lymphoma.

Biopsy of skin dermatitis may be extraordinarily helpful in this scenario if the etiology is not readily evident from history and physical examination alone. Table 1 provides a list of differential diagnoses for when there is little or no primary dermatitis identifiable. Where available, the incidence of pruritus in that condition is given.

Table 1. Pruritus Differential With Little or No Primary Dermatitis

Disease State | Prevalence of Pruritus (%)
Neoplastic:
– Hodgkin disease | 30 [1]
– Non-Hodgkin lymphoma | 15 [2]
– Leukemias | 5 [3]
– Carcinoid syndrome
– Paraproteinemias
Iron deficiency anemia
Polycythemia rubra vera | ≤50 [4]
Hyper-IgE syndromes
Parasitic helminthic infection
Drug-induced eosinophilia
Chronic renal insufficiency | 57 [5]
Liver disease:
– Primary biliary cirrhosis | 69 [6]
– Viral hepatitis infection | 15 [7]
– Cholestatic disease
– Autoimmune hepatitis
Thyroid dysfunction:
– Hashimoto thyroiditis
– Hypothyroidism
– Hyperthyroidism
Medication induced:
– Opioids (codeine, morphine, butorphanol)
– Hydroxyethyl starch
– Antimalarials (chloroquine, hydroxychloroquine, quinacrine)
– 8-methoxypsoralen
– Beta blockers
– Hormones (estrogens, testosterone, progestins, anabolic steroids)
– Phenothiazines
– Aspirin
– HMG-CoA reductase inhibitors
Diabetes mellitus
HIV infection
Postherpetic neuralgia | ≤60 [8]
Pregnancy | 18 [3]
Xerosis
Psychogenic (somatization, anxiety, depression, neurosis)
Stroke sequelae
Multiple sclerosis

HMG-CoA = 3-hydroxy-3-methyl-glutaryl–coenzyme A; IgE = immunoglobulin E.

As evident from the differential, a solid history and physical examination are essential for sorting through the possibilities. To corroborate the clinical impression, a limited number of laboratory and radiological examinations also may be used to rule in or rule out many of the possibilities. For more information, see the Assessment section.

Hypothesized mechanisms of pruritus have been inferred from studies of pain because pain and itching share common molecular and neurophysiological mechanisms.[9] Both itch and pain sensations result from the activation of a network of free nerve endings at the dermal-epidermal junction. Activation may be the result of internal or external thermal, mechanical, chemical, or electrical stimulation. The cutaneous nerve stimulation is activated or mediated by several substances, including the following:

- Histamine.
- Vasoactive peptides.
- Enkephalins.
- Substance P (a tachykinin that affects smooth muscle).
- Prostaglandins.
- Interleukins (IL-4, IL-13, IL-31).[10]

It is believed that nonanatomical factors (such as psychological stress, tolerance, and presence and intensity of other sensations and/or distractions) determine itch sensitivity in different regions of the body.

The itch impulse is transmitted along the same neural pathway as pain impulses, i.e., traveling from peripheral nerves to the dorsal horn of the spinal cord, across the cord via the anterior commissure, and ascending along the spinothalamic tract to the laminar nuclei of the contralateral thalamus. Thalamocortical tracts of tertiary neurons are believed to relay the impulse through the integrating reticular activating system of the thalamus to several areas of the cerebral cortex. Factors that are believed to enhance the sensation of itch include:[9,11-13]

- Dryness of the epidermis and dermis.
- Anoxia of tissues.
- Dilation of the capillaries.
- Irritating stimuli.
- Psychological responses.

The motor response of scratching follows the perception of itch. Scratching is modulated at the corticothalamic center and is a spinal reflex. Itching may be relieved for 15 to 25 minutes after scratching. The mechanism through which the itch is relieved by scratching is unknown. It is hypothesized that scratching generates sensory impulses that break circuits in the relay areas of the spinal cord. However, scratching may actually enhance the sensation of itching, creating a characteristic itch-scratch-itch cycle. Other physical stimuli such as vibration, heat, cold, and ultraviolet radiation diminish itching and increase the release of proteolytic enzymes, potentially eliciting the itch-scratch-itch cycle.

A pinprick near or in the same dermatome as an itchy point will abolish the itch sensation.[12] It is known that hard scratching may substitute pain for the itch, and in some instances, the patient might find pain the more tolerable sensation. It is thought that spinal modulation of afferent stimuli (Gate theory) and central mechanisms may play a role in the relief of itch.[12]

Hypothesized pathogenesis of pruritus associated with underlying disease states is varied. Biliary, hepatic, renal, and malignant diseases are thought to produce pruritus through circulating toxic substances. Histamine released from circulating basophils and the release of leukopeptidase from white blood cells may trigger pruritus associated with lymphomas and leukemias. Elevated blood levels of kininogen in Hodgkin lymphoma, the release of histamine or bradykinin precursors from solid tumors, and the release of serotonin in carcinoids may all be related to pruritus.[11,14]

People receiving cytotoxic chemotherapy, radiation therapy, and/or biologic response modifiers for the treatment of malignancy are likely to experience pruritus. This population is likely to be exposed to many of the other etiological factors related to pruritus, ranging from nutrition-related xerosis (dry skin) to radiation desquamation, chemotherapy-induced and biologic agent–induced side effects, antibiotic reactions, and other drug sensitivities. Because many of these therapies lead to decreased cell turnover, skin can become thin, atrophic, and dehydrated. Long-term xerosis may also occur with poor recovery of sweat, sebaceous, and apocrine gland function after a course of cytotoxic therapy.

### References

Gobbi PG, Attardo-Parrinello G, Lattanzio G, et al.: Severe pruritus should be a B-symptom in Hodgkin's disease. Cancer 51 (10): 1934-6, 1983.6831358
Kumar SS, Kuruvilla M, Pai GS, et al.: Cutaneous manifestations of non-Hodgkin's lymphoma. Indian J Dermatol Venereol Leprol 69 (1): 12-5, 2003 Jan-Feb.17642814
Weisshaar E, Dalgard F: Epidemiology of itch: adding to the burden of skin morbidity. Acta Derm Venereol 89 (4): 339-50, 2009.19688144
Diehn F, Tefferi A: Pruritus in polycythaemia vera: prevalence, laboratory correlates and management. Br J Haematol 115 (3): 619-21, 2001.11736946
Duque MI, Thevarajah S, Chan YH, et al.: Uremic pruritus is associated with higher kt/V and serum calcium concentration. Clin Nephrol 66 (3): 184-91, 2006.16995341
Rishe E, Azarm A, Bergasa NV: Itch in primary biliary cirrhosis: a patients' perspective. Acta Derm Venereol 88 (1): 34-7, 2008.18176748
Cribier B, Samain F, Vetter D, et al.: Systematic cutaneous examination in hepatitis C virus infected patients. Acta Derm Venereol 78 (5): 355-7, 1998.9779254
Oaklander AL, Bowsher D, Galer B, et al.: Herpes zoster itch: preliminary epidemiologic data. J Pain 4 (6): 338-43, 2003.14622691
Greaves MW: Pathophysiology of pruritus. In: Fitzpatrick TB, Eisen AZ, Wolff K, et al., eds.: Dermatology in General Medicine. 3rd ed. McGraw-Hill, 1987, Chapter 7, pp 74-78.
Erickson S, Nahmias Z, Rosman IS, et al.: Immunomodulating Agents as Antipruritics. Dermatol Clin 36 (3): 325-334, 2018.29929604
Abel EA, Farber EM: Malignant cutaneous tumors. In: Rubenstein E, Federman DD, eds.: Scientific American Medicine. Scientific American, Inc, Chapter 2: Dermatology, Section XII, 1-20, 1992.
Bernhard JD: Clinical aspects of pruritus. In: Fitzpatrick TB, Eisen AZ, Wolff K, et al., eds.: Dermatology in General Medicine. 3rd ed. McGraw-Hill, 1987, Chapter 7, pp 78-90.
Duncan WC, Fenske NA: Cutaneous signs of internal disease in the elderly. Geriatrics 45 (8): 24-30, 1990.2199335 90337356
Abel EA, Farber EM: Drug eruptions and urticaria. In: Rubenstein E, Federman DD, eds.: Scientific American Medicine. Scientific American, Inc, Chapter 2: Dermatology, Section VI, 1-11, 1990.

## Assessment

Pruritus is a symptom, not a diagnosis or disease. Generalized pruritus should be investigated because of its strong medical significance, as outlined above, particularly if it interferes with daily activities or sleep, and/or is intractable. For more information, see the Etiology and Pathophysiology section. Assessment of pruritus must incorporate an accurate and thorough history and physical examination.[1]

A history includes the following data:

- Location, onset, duration, and intensity of itching.
- Effect on activities of daily living or sleep.
- Factors that relieve and aggravate itching.
- Other family members or pets affected.
- History of pruritus.
- History of malignant disease.
- Current malignant disease and treatment.
- Nonmalignant systemic diseases.
- Use of medications (analgesics, antibiotics, and other prescription and nonprescription drugs, including illicit drugs).
- Nutritional and fluid level status.
- Social history (hobbies, occupation, sexual history, and travel).
- Current skin care practices.
- Patient’s emotional state.

A physical examination provides data from an assessment of the following:

- All skin surfaces for signs of infection.
- All skin surfaces for signs of primary dermatitis (e.g., drug reaction, psoriasis, atopic dermatitis, connective tissue disease, and lichen planus).
- All skin surfaces for signs of secondary dermatitis (e.g., macular erythema, dryness, excoriation, linear petechiae, prurigo nodules, and lichen simplex chronicus).
- Environmental factors (temperature, humidity).
- Physical factors (tight, constrictive clothing).
- Skin turgor, texture, color, temperature, and cutaneous neoplasms.

First-line studies should include the following:

- Complete blood count with differential and platelet count.
- Renal function (blood urea nitrogen, serum creatinine).
- Hepatic function (transaminases, alkaline phosphatase, bilirubin).
- Lactate dehydrogenase.
- Thyroid function (thyroid-stimulating hormone, thyroxin levels).
- Chest x-ray.
- Erythrocyte sedimentation rate.

Second-line laboratory studies guided by a review of systems and a physical examination may include the following:

- Skin biopsy (routine histology with and without direct immunofluorescence).
- HIV screening.
- Serum iron, total iron-binding capacity, and ferritin.
- Fasting glucose and hemoglobin A1C.
- Parathyroid function (calcium, phosphate, and parathyroid hormone levels).
- Viral hepatitis screening.
- Serum immunoglobulin E levels.
- Serum protein electrophoresis/serum immunofixation electrophoresis.
- Tissue transglutaminase and endomysial antibodies.
- Serum tryptase, histamine, and/or chromogranin-A levels.
- Urine for sediment; 24-hour urine collection for 5-hydroxyindoleacetic acid (serotonin metabolite) and methylimidazoleacetic acid (histamine metabolite).
- Stool for occult blood, ova, and parasite.

### References

Weisshaar E, Fleischer AB Jr, Bernhard JD, et al.: Pruritus and dysesthesia. In: Bolognia JL, Jorizzo JL, Schaffer JV: Dermatology. 3rd ed. Elsevier Saunders, 2012, pp 111-25.

## Interventions

Note: Some citations in this section are followed by a level of evidence. The PDQ Editorial Boards use a formal ranking system to help the reader judge the strength of evidence linked to the reported results of a therapeutic strategy. For more information, see Levels of Evidence.

If an underlying cause of pruritus is identified, treatment of the primary disease or correction of the underlying abnormality is the primary therapy. For example, iron supplementation in the setting of iron-deficiency anemia or thyroid supplementation for hypothyroidism should be initiated first. However, gentle skin techniques are considered helpful adjuvant therapies, even if they are not expected to completely alleviate the symptoms.

Interventions for pruritus can be categorized into four distinct groups:

1. Prevention and elimination of provocative factors.
2. Topical therapies.
3. Systemic therapies.
4. Physical modalities.

### Prevention and Elimination of Provocative Factors

Patients and caregivers must be included in planning and providing care to the extent possible. Education is an important aspect of symptom control. Skin care regimens incorporate protection from the environment, good cleansing practices, and internal and external hydration.[1][Level of evidence: IV] The intensity of the regimen and the techniques used will vary according to etiological factors and the degree of distress associated with pruritus.

Adequate nutrition is essential to the maintenance of healthy skin. An optimal diet should include a balance of proteins, carbohydrates, fats, vitamins, minerals, and fluids. Daily fluid intake of at least 3,000 mL is suggested as a guideline but may not be possible for some individuals.[2,3]

Aggravating factors should be avoided, including the following:

- Fluid loss secondary to fever, diarrhea, nausea and vomiting, or decreased fluid intake.
- Bathing with hot water.
- Using bubble baths or soaps that contain detergents.
- Bathing more than once a day or bathing for longer than 30 minutes.
- Using soap and adding oil early in a bath.
- Using a reusable fomite for scrubbing (e.g., buff-puff or loofah sponge).
- Using scents, fragrances, and perfumes.
- Dry environment.
- Laundering sheets and clothing with detergent containing scents, dyes, and preservatives.
- Using fabric softener sheets.
- Wearing tight restrictive clothing or clothing made of wool, synthetics, or other harsh/scratchy fabric.
- Using underarm deodorants or antiperspirants.
- Applying topical preparations containing scents, dyes, or preservatives.
- Emotional stress.

Alleviating factors should be promoted, as follows:

- Applying unscented emollient creams or ointments.
- Bathing in tepid water.
- Using mild skin cleansers (nonsoap) or soaps made for sensitive skin (e.g., Cetaphil cleanser, Dove for Sensitive Skin, Oilatum, Basis).
- Using soap only for dirty areas; otherwise, water is sufficient.
- Limiting bathing to 30 minutes daily or every other day.
- Adding oil and using soap at the end of a bath or adding a colloidal oatmeal treatment early to the bath.
- Gently washing, if needed, with a clean, soft cotton washcloth.
- Rinsing all residue from bathing with fresh tepid water.
- Drying off by patting skin instead of rubbing.
- Maintaining a humid environment (e.g., using a humidifier).
- Using cotton flannel blankets, if needed.
- Washing sheets, clothing, and undergarments in mild soaps for infant clothing containing no scents, dyes, or preservatives (e.g., Dreft, All Free Clear, Tide Free and Gentle).
- Using liquid fabric softener that is rinsed out in the wash (e.g., All Free Clear Fabric Softener) or avoiding fabric softener altogether.
- Wearing loose-fitting clothing and clothing made of cotton or other soft fabrics.
- Using distraction, relaxation, positive imagery, or cutaneous stimulation.

Heat increases cutaneous blood flow and may enhance itching. Heat also lowers humidity, and skin loses moisture when the relative humidity falls below 40%. A cool, humid environment may reverse these processes. Extensive bathing aggravates dry skin, and hot baths exacerbate fluid loss by causing vasodilation. The vasodilation results in increased blood flow, which enhances itching. Tepid baths have an antipruritic effect, possibly resulting from capillary vasoconstriction.

The goal of skin cleansing is to remove dirt and prevent odor, but actual hygienic practices are influenced by skin type, lifestyle, and culture. Bathing should be limited to 30 minutes every day or every 2 days.

Many soaps are salts of fatty acids with an alkali base, leading to excessive defatting of the skin lipids and altered skin pH, irritating the skin. Older adults or individuals with dry skin should limit the use of soaps to areas with apocrine glands. Plain water should suffice for cleaning other skin surfaces. Mild soaps have less soap or detergent content. Soap is a degreaser and can also irritate skin. Superfatted soaps deposit a film of oil on the skin surface, but there is no proof that they are less drying than other soaps, and they may be more expensive.

Residue left by detergents after bathing or used in laundering clothes and linens, as well as fabric softeners and antistatic products, may aggravate pruritus. Clothing detergent residue can be neutralized by the addition of vinegar (1 teaspoon per quart of water) to rinse water. Mild laundry soaps marketed for infant items also may offer a solution.

Loose-fitting, lightweight cotton clothes and cotton bed sheets are suggested. The elimination of heavy bedcovers may alleviate itching by decreasing body heat. Wool and some synthetic fabrics may be irritating. Distraction, music therapy, relaxation, and imagery may be useful to relieve symptoms.[4]

### Topical Therapies

#### Over-the-counter products

Some topical agents—including cornstarch, talcum powder, perfumed powders, and bubble baths—can irritate the skin and cause pruritus. Cornstarch has been an acceptable intervention for pruritus associated with dry desquamation related to radiation therapy; however, it should not be applied to moist skin surfaces, areas with hair, sebaceous glands, skin folds (intertriginous zones), or areas close to mucosal surfaces, such as the vagina and rectum.[5,6] Glucose is formed when cornstarch is moistened, providing an excellent medium for fungal growth.[6]

Agents with metal ions (i.e., talcum and aluminum used in antiperspirants) enhance skin reactions during external-beam radiation therapy and should be avoided throughout the course of radiation therapy. Talcum-based agents are otherwise preferred over cornstarch-based modalities when needed, particularly for intertriginous zones. Other common ingredients in over-the-counter lotions and creams that may enhance skin reactions include alcohol, topical antibiotics, and topical anesthetics.

If pruritus is thought to be primarily related to dry skin, interventions to improve skin hydration can be used. The main source of hydration for skin is moisture from the vasculature of underlying tissues. Water, not lipid, regulates the pliability of the epidermis, providing the rationale for using emollients.[7] Emollients reduce evaporation by forming occlusive and semi-occlusive films over the skin surface, encouraging the production of moisture in the layer of epidermis beneath the film.[8][Level of evidence: IV]

Knowledge about the ingredients in skin care products is essential because many ingredients may enhance skin reactions. The three main ingredients of emollients are as follows:

- Petrolatum, which is poorly absorbed by irradiated skin and is not easily removed. A thick layer could produce an undesired bolus effect when applied within a radiation treatment field.[9][Level of evidence: IV]
- Lanolin, which may cause allergic sensitization in some individuals.[8][Level of evidence: IV]
- Mineral oil, which is used in combination with petrolatum and lanolin to create creams and lotions and may be an active ingredient in bath oils.

Other ingredients added to these products—such as thickeners, opacifiers, preservatives, fragrances, and colorings—may cause allergic skin reactions.

Product selection and recommendations must be made in consideration of each patient’s unique needs and should incorporate variables such as the following:[1][Level of evidence: IV]

- Individual’s skin.
- Desired effect.
- Consistency and texture of the preparation.
- Cost and acceptability to the patient.

Emollient creams or lotions should be applied at least two or three times daily and after bathing. Gels with a local anesthetic (0.5%–5% lidocaine) can be used on some small areas (with the caveat that gels are composed of mostly alcohol-based vehicles) as often as every 2 hours if necessary.[10][Level of evidence: IV]

Over-the-counter products containing menthol, camphor, pramoxine, or capsaicin can be used for certain areas of severe pruritus. These substances soothe, cool, or inhibit itch sensations, raising the threshold for itch perception. Capsaicin-based therapies are more likely to be beneficial in pruritus of neuropathic origin.[11]

#### Prescription products

Topical steroids can reduce itching, but they reduce blood flow to the skin, resulting in thinning of the skin and increased susceptibility to injury.[12][Level of evidence: IV] Topical steroids should therefore be reserved for pruritic skin with associated primary dermatitis or inflammatory etiologies. Some practitioners may formulate their own mixture of dilute steroid-containing moisturizer by compounding menthol 0.5% and fluocinonide 0.0125% into a Vanicream base (fluocinonide 0.05% 60 g, menthol 480 mg, and Vanicream QSAD 240 g). Topical steroids should not be applied to skin surfaces inside a radiation field during treatment but may be used successfully for radiation-induced dermatitis after the treatment course has concluded.

For more-severe xerosis or keratoderma, humectants may be indicated. These products not only provide an occlusive or semi-occlusive barrier for water, but also chemically exfoliate an excessively cornified layer while drawing dermal fluid into the epidermal compartment. Humectant choices include:[13][Level of evidence: IV]

- Salicylic acid 6% cream.
- Ammonium lactate 12% cream.
- Creams and ointments containing urea 10% to 50%.

Humectants can significantly improve skin pliability and reduce fissuring, but care must be taken that they do not get into fissures because they can cause stinging sensations on open erosions.

### Systemic Therapies

Systemic medications used to manage pruritus include those directed toward the underlying disease or control of symptoms. Antibiotics can reduce symptoms associated with infection. Oral antihistamines may provide symptomatic relief in histamine-related itching; however, they are not considered useful in pruritus of neuropathic origin. It is believed that the sedative effect of antihistamines adds to their antipruritic efficacy; therefore, a higher dose of antihistamine at bedtime may produce desirable potentiation of the antipruritic effect by also providing this sedative effect. If one antihistamine is ineffective, one from another class may provide relief (see Table 2).

Second-generation antihistamines have several advantages over first-generation antihistamines.[14] Decreased activity on nonhistamine receptors results in fewer adverse effects. In addition, second-generation antihistamines dissociate slowly from histamine receptors, allowing for once-daily dosing. Compared with first-generation antihistamines, second-generation antihistamines produce less central nervous system penetration and therefore less sedation. Given these advantages, using doses of levocetirizine and desloratadine higher than those approved by the U.S. Food and Drug Administration has been suggested to provide relief for some patients with chronic urticarial conditions.[15] However, studies of cetirizone have produced conflicting results.[16,17]

Table 2. Antihistamines Used to Alleviate Pruritus^a^

Drug Category | Medication | Dose | Comments | Reference
First generation | Diphenhydramine | 25–100 mg q6h | | [19][Level of evidence: IV]
First generation | Hydroxyzine | 25–50 mg q6–8h | Abrupt withdrawal may cause confusion. | [20]; [21][Level of evidence: I]
First generation | Cyproheptadine | 4 mg q6–8h | | [20][Level of evidence: IV]
First generation | Chlorpheniramine | 4 mg q4–6h | | [22][Level of evidence: IV]
Second generation | Cetirizine | 5–10 mg daily | Conflicting results when 20–40 mg/day studied. | [16][Level of evidence: I]; [17][Level of evidence: II]
Second generation | Levocetirizine | 2.5–5 mg daily | Safe to increase dose up to 20 mg daily; may provide better symptom control. | [15,23][Level of evidence: I]
Second generation | Loratadine | 10 mg daily | | [24][Level of evidence: I]
Second generation | Desloratadine | 5 mg daily | Safe to increase dose up to 20 mg daily; may provide better symptom control. | [23]
Second generation | Fexofenadine | 60 mg q12h or 180 mg daily (SR tablet) | | [25][Level of evidence: I]

SR = sustained release.

^a^Table abstracted from Lexicomp Online.[18]

Several alternative medications can be used to alleviate pruritus (see Table 3). Antidepressants can have strong antihistamine and antipruritic effects.[22][Level of evidence: IV] Tricyclic antidepressants such as doxepin, amitriptyline, nortriptyline, and trimipramine have additional antihistaminic effects, making them of additional benefit in dermatological conditions such as urticaria. However, the generally more-favorable side-effect profile of selective serotonin reuptake inhibitors and selective norepinephrine reuptake inhibitors has made them the first-line agents in the management of psychogenic pruritus.[26][Level of evidence: II]

Aspirin may reduce pruritus in some individuals with polycythemia vera, while increasing pruritus in others. Patients with thrombocytopenic cancer should be cautioned against using aspirin. Cimetidine alone or in combination with aspirin has been used with some effectiveness for pruritus associated with Hodgkin lymphoma and polycythemia vera.[27][Level of evidence: III]

Novel agents to try in recalcitrant cases of pruritus include gabapentin, pregabalin, and botulinum toxin injection, particularly for neurogenic itch such as post-herpetic neuralgia.[28,29] Aprepitant has been used successfully in the treatment of pruritus by blocking the neurokinin-1 receptor, which is activated by substance P.[30][Level of evidence: III]

Table 3. Alternative Medications Used to Alleviate Pruritus^a^

Drug Category | Medication | Dose | Comments | Reference
Tricyclic antidepressant | Amitriptyline | 25–150 mg daily | Start as 10 mg tid or 25 mg at bedtime. | [29][Level of evidence: IV]
Tricyclic antidepressant | Doxepin | 10–25 mg q8h | | [31][Level of evidence: IV]
Selective serotonin reuptake inhibitor | Fluvoxamine | 50–100 mg daily | | [32][Level of evidence: II]
Selective serotonin reuptake inhibitor | Mirtazapine | 7.5–15 mg at bedtime | No value to >15 mg. | [29][Level of evidence: IV]
Selective serotonin reuptake inhibitor | Paroxetine | 20 mg daily | | [33][Level of evidence: I]
Selective serotonin reuptake inhibitor | Sertraline | 75–100 mg daily | | [34][Level of evidence: I]
GABA analogue | Gabapentin | 100–300 mg daily, titrated to effect | Dose must be adjusted for renal dysfunction. | [35][Level of evidence: I]
GABA analogue | Pregabalin | 75 mg daily | Dose must be adjusted for renal dysfunction. | [36][Level of evidence: I]
Sequestrant agent | Ursodiol (ursodeoxycholic acid) | 10–15 mg/kg of body weight per day | For pruritus of cholestasis. | [37][Level of evidence: IV]
Sequestrant agent | Cholestyramine | 4–16 g daily | For pruritus of cholestasis. | [37][Level of evidence: IV]
Opioid antagonist | Naloxone | 0.2 µg/kg of body weight per min IV | Efficacy in cholestatic pruritus; conflicting results in ESRD itch. Can cause pain by antagonizing mu-receptor. | [38][Level of evidence: I]; [39]
Opioid antagonist | Naltrexone | 25–100 mg daily | Efficacy in cholestatic pruritus, atopic eczema; conflicting results in ESRD itch. Can cause pain by antagonizing mu-receptor. | [39]; [40,41][Level of evidence: I]
Opioid antagonist | Butorphanol | 1–4 mg q4–6h intranasally | | [42][Level of evidence: II]
Opioid antagonist | Nalbuphine | 2.5–5 mg IV | For opioid-induced pruritus. | [43][Level of evidence: IV]
Miscellaneous agent | Aprepitant | 80 mg daily | | [30][Level of evidence: III]
Miscellaneous agent | Aspirin | 500 mg q8–24h | Only used for polycythemia vera. Positive and negative data. | [31][Level of evidence: I]
Miscellaneous agent | Botulinum toxin | 16–25 units injected into the dermatome | | [29][Level of evidence: IV]
Miscellaneous agent | Capsaicin 0.025% | Apply 5 times daily × 1 week, then 3 times daily | For neurological pruritus. | [44][Level of evidence: I]
Miscellaneous agent | Cimetidine | 200 mg q6h | Only used for polycythemia vera. | [31][Level of evidence: IV]
Miscellaneous agent | Cyclosporine | 3–4.5 mg/kg of body weight per day | Requires close monitoring for renal toxicity. | [45][Level of evidence: I]
Miscellaneous agent | Pimecrolimus 1% cream | Apply twice daily | | [46][Level of evidence: I]

ESRD = end-stage renal disease; GABA = gamma-aminobutyric acid; IV = intravenously; tid = 3 times a day.

^a^Table abstracted from Lexicomp Online.[18]

Sequestrant agents may be effective in relieving pruritus associated with renal or hepatic disease through binding and removing pruritogenic substances in the gut and reducing bile salt concentration. Choices include ursodeoxycholic acid and cholestyramine; however, cholestyramine is not always effective and produces gastric side effects.[47] Because of the association of pruritus with opioid receptor agonism, increased catabolism of endogenous opioids using rifampin in uremia may be beneficial.[48] Opioid antagonists such as naloxone, naltrexone, nalmefene, butorphanol, and nalbuphine may also have some benefit, particularly in patients with uremic pruritus.[26,40][Level of evidence: III]

### Physical Modalities

Alternatives to scratching for the relief of pruritus can help the patient interrupt the itch-scratch-itch cycle. Substituting the application of emollients for scratching may help reduce skin breakdown. The application of a cool washcloth or ice over the site may be useful. Firm pressure at the site of itching, at a site contralateral to the site of itching, and at acupressure points may break the neural pathway. Rubbing, pressure, and vibration can be used to relieve itching.[49][Level of evidence: IV]; [4]

There are anecdotal reports of the use of transcutaneous electronic nerve stimulators (TENS) and acupuncture in the management of pruritus.[50] Ultraviolet phototherapy has been used with limited success to treat pruritus related to uremia.[50]

### References

Detz W, Berman B: Aids that preserve hydration and mitigate its loss. Consultant 24: 46-62, 1984.
Lydon J, Purl S, Goodman M: Integumentary and mucous membrane alterations. In: Groenwald SL, Frogge MH, Goodman M, et al., eds.: Cancer Nursing: Principles and Practice. 2nd ed. Jones and Bartlett, 1990, pp 594-635.
Pace KB, Bord MA, McCray N, et al.: Pruritus. In: McNally JC, Stair JC, Somerville ET, eds.: Guidelines for Cancer Nursing Practice. Grune and Stratton, Inc., 1985, pp 85-88.
Yasko JM, Hogan CM: Pruritus. In: Yasko J, ed.: Guidelines for Cancer Care: Symptom Management. Reston Publishing Company, Inc., 1983, pp 125-129.
Hassey KM: Skin care for patients receiving radiation therapy for rectal cancer. J Enterostomal Ther 14 (5): 197-200, 1987 Sep-Oct.3655092 88008598
Maienza J: Alternatives to cornstarch for itchiness. Oncol Nurs Forum 15 (2): 199-200, 1988 Mar-Apr.3357836 88189901
Blank L: Factors which influence the water content of the stratum corneum. J Invest Dermatol 18 (2): 133-39, 1952.
Klein L: Maintenance of healthy skin. J Enterostomal Ther 15 (6): 227-31, 1988 Nov-Dec.3204210 89079965
Hilderley L: Skin care in radiation therapy. A review of the literature. Oncol Nurs Forum 10 (1): 51-6, 1983 Winter.6346274 83246750
De Conno F, Ventafridda V, Saita L: Skin problems in advanced and terminal cancer patients. J Pain Symptom Manage 6 (4): 247-56, 1991.2030300 91231732
Misery L, Brenaut E, Le Garrec R, et al.: Neuropathic pruritus. Nat Rev Neurol 10 (7): 408-16, 2014.24912513
Hassey KM, Rose CM: Altered skin integrity in patients receiving radiation therapy. Oncol Nurs Forum 9 (4): 44-50, 1982 Fall.6215631 83038944
Nolan K, Marmur E: Moisturizers: reality and the skin benefits. Dermatol Ther 25 (3): 229-33, 2012 May-Jun.22913439
O'Donoghue M, Tharp MD: Antihistamines and their role as antipruritics. Dermatol Ther 18 (4): 333-40, 2005 Jul-Aug.16297006
Nettis E, Colanardi MC, Barra L, et al.: Levocetirizine in the treatment of chronic idiopathic urticaria: a randomized, double-blind, placebo-controlled study. Br J Dermatol 154 (3): 533-8, 2006.16445787
Hannuksela M, Kalimo K, Lammintausta K, et al.: Dose ranging study: cetirizine in the treatment of atopic dermatitis in adults. Ann Allergy 70 (2): 127-33, 1993.8430920
Asero R: Chronic unremitting urticaria: is the use of antihistamines above the licensed dose effective? A preliminary study of cetirizine at licensed and above-licensed doses. Clin Exp Dermatol 32 (1): 34-8, 2007.17042777
Lexicomp Online. Hudson, Ohio: Lexi-Comp, Inc., 2025. Available online with subscription (https://www.wolterskluwer.com/en/solutions/uptodate/enterprise/lexidrug). Last accessed Jan. 15, 2025.
Geltman RL, Paige RL: Symptom management in hospice care. Am J Nurs 83 (1): 78-85, 1983.6549725 83097710
Levy M: Symptom control manual. In: Cassileth BR, Cassileth PA, eds.: Clinical Care of the Terminal Cancer Patient. Lea and Febiger, 1982, pp 214-262.
Monroe EW, Bernstein DI, Fox RW, et al.: Relative efficacy and safety of loratadine, hydroxyzine, and placebo in chronic idiopathic urticaria. Arzneimittelforschung 42 (9): 1119-21, 1992.1445478
Winkelmann RK: Pharmacologic control of pruritus. Med Clin North Am 66 (5): 1119-33, 1982.6752601 83035533
Staevska M, Popov TA, Kralimarkova T, et al.: The effectiveness of levocetirizine and desloratadine in up to 4 times conventional doses in difficult-to-treat urticaria. J Allergy Clin Immunol 125 (3): 676-82, 2010.20226302
Langeland T, Fagertun HE, Larsen S: Therapeutic effect of loratadine on pruritus in patients with atopic dermatitis. A multi-crossover-designed study. Allergy 49 (1): 22-6, 1994.8198236
Kaplan AP, Spector SL, Meeves S, et al.: Once-daily fexofenadine treatment for chronic idiopathic urticaria: a multicenter, randomized, double-blind, placebo-controlled study. Ann Allergy Asthma Immunol 94 (6): 662-9, 2005.15984599
Zhang H, Yang Y, Cui J, et al.: Gaining a comprehensive understanding of pruritus. Indian J Dermatol Venereol Leprol 78 (5): 532-44, 2012 Sep-Oct.22960808
Daly BM, Shuster S: Effect of aspirin on pruritus. Br Med J (Clin Res Ed) 293 (6552): 907, 1986.3094711 87027309
Scheinfeld N: The role of gabapentin in treating diseases with cutaneous manifestations and pain. Int J Dermatol 42 (6): 491-5, 2003.12786883
Yosipovitch G, Samuel LS: Neuropathic and psychogenic itch. Dermatol Ther 21 (1): 32-41, 2008 Jan-Feb.18318883
Ständer S, Siepmann D, Herrgott I, et al.: Targeting the neurokinin receptor 1 with aprepitant: a novel antipruritic strategy. PLoS One 5 (6): e10968, 2010.20532044
Krajnik M, Zylicz Z: Understanding pruritus in systemic disease. J Pain Symptom Manage 21 (2): 151-68, 2001.11226766
Ständer S, Böckenholt B, Schürmeyer-Horst F, et al.: Treatment of chronic pruritus with the selective serotonin re-uptake inhibitors paroxetine and fluvoxamine: results of an open-labelled, two-arm proof-of-concept study. Acta Derm Venereol 89 (1): 45-51, 2009.19197541
Zylicz Z, Krajnik M, Sorge AA, et al.: Paroxetine in the treatment of severe non-dermatological pruritus: a randomized, controlled trial. J Pain Symptom Manage 26 (6): 1105-12, 2003.14654262
Mayo MJ, Handem I, Saldana S, et al.: Sertraline as a first-line treatment for cholestatic pruritus. Hepatology 45 (3): 666-74, 2007.17326161
Gunal AI, Ozalp G, Yoldas TK, et al.: Gabapentin therapy for pruritus in haemodialysis patients: a randomized, placebo-controlled, double-blind trial. Nephrol Dial Transplant 19 (12): 3137-9, 2004.15575002
Solak Y, Biyik Z, Atalay H, et al.: Pregabalin versus gabapentin in the treatment of neuropathic pruritus in maintenance haemodialysis patients: a prospective, crossover study. Nephrology (Carlton) 17 (8): 710-7, 2012.22909343
Kremer AE, Oude Elferink RP, Beuers U: Pathophysiology and current management of pruritus in liver disease. Clin Res Hepatol Gastroenterol 35 (2): 89-97, 2011.21809485
Bergasa NV, Alling DW, Talbot TL, et al.: Effects of naloxone infusions in patients with the pruritus of cholestasis. A double-blind, randomized, controlled trial. Ann Intern Med 123 (3): 161-7, 1995.7598296
Wang H, Yosipovitch G: New insights into the pathophysiology and treatment of chronic itch in patients with end-stage renal disease, chronic liver disease, and lymphoma. Int J Dermatol 49 (1): 1-11, 2010.20465602
Peer G, Kivity S, Agami O, et al.: Randomised crossover trial of naltrexone in uraemic pruritus. Lancet 348 (9041): 1552-4, 1996.8950882
Malekzad F, Arbabi M, Mohtasham N, et al.: Efficacy of oral naltrexone on pruritus in atopic eczema: a double-blind, placebo-controlled study. J Eur Acad Dermatol Venereol 23 (8): 948-50, 2009.19453814
Dawn AG, Yosipovitch G: Butorphanol for treatment of intractable pruritus. J Am Acad Dermatol 54 (3): 527-31, 2006.16488311
Jannuzzi RG: Nalbuphine for Treatment of Opioid-induced Pruritus: A Systematic Review of Literature. Clin J Pain 32 (1): 87-93, 2016.26650717
Wallengren J, Klinker M: Successful treatment of notalgia paresthetica with topical capsaicin: vehicle-controlled, double-blind, crossover study. J Am Acad Dermatol 32 (2 Pt 1): 287-9, 1995.7829721
Weisshaar E, Szepietowski JC, Darsow U, et al.: European guideline on chronic pruritus. Acta Derm Venereol 92 (5): 563-81, 2012.22790094
Kaufmann R, Bieber T, Helgesen AL, et al.: Onset of pruritus relief with pimecrolimus cream 1% in adult patients with atopic dermatitis: a randomized trial. Allergy 61 (3): 375-81, 2006.16436149
Abel EA, Farber EM: Malignant cutaneous tumors. In: Rubenstein E, Federman DD, eds.: Scientific American Medicine. Scientific American, Inc, Chapter 2: Dermatology, Section XII, 1-20, 1992.
Miguet JP, Mavier P, Soussy CJ, et al.: Induction of hepatic microsomal enzymes after brief administration of rifampicin in man. Gastroenterology 72 (5 Pt 1): 924-6, 1977.849823
Dangel RB: Pruritus and cancer. Oncol Nurs Forum 13 (1): 17-21, 1986 Jan-Feb.3632855 86093840
Bernhard JD: Clinical aspects of pruritus. In: Fitzpatrick TB, Eisen AZ, Wolff K, et al., eds.: Dermatology in General Medicine. 3rd ed. McGraw-Hill, 1987, Chapter 7, pp 78-90.

## Latest Updates to This Summary (01/17/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of pruritus. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewer for Pruritus is:

- Larry D. Cripe, MD (Indiana University School of Medicine)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Pruritus. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/skin-nail-changes/pruritus-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389231]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).